# Paranasal Sinus and Nasal Cavity Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult paranasal sinus and nasal cavity cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Paranasal Sinus and Nasal Cavity Cancer

### Incidence and Mortality

Most tumors of the paranasal sinuses present with advanced disease, and cure rates are generally poor (≤50%). Squamous cell carcinoma (SCC) is the most frequent type of malignant tumor in the nose and paranasal sinuses (70%–80%). Papillomas are distinct entities that may undergo malignant degeneration. The cancers grow within the bony confines of the sinuses and are often asymptomatic until they erode and invade adjacent structures.[1-3]

Nodal involvement is infrequent. Metastases from both the nasal cavity and paranasal sinuses may occur, and distant metastases are found in 20% to 40% of patients who do not respond to treatment. However, locoregional recurrence accounts for most cancer deaths because most patients die of direct extension into vital areas of the skull or of rapidly recurring local disease.

Cancers of the maxillary sinus are the most common of the paranasal sinus cancers. Tumors of the ethmoid sinuses, nasal vestibule, and nasal cavity are less common, and tumors of the sphenoid and frontal sinuses are rare.

### Anatomy

The major lymphatic drainage route of the maxillary antrum is through the lateral and inferior collecting trunks to the first station submandibular, parotid, and jugulodigastric nodes and through the superoposterior trunk to retropharyngeal and jugular nodes.

### Clinical Evaluation and Follow-Up

Pretreatment evaluation and staging, as well as the need for multidisciplinary planning of treatment, is very important. Generally, the first opportunity to treat patients with head and neck cancers is the most effective, although salvage surgery or salvage radiation therapy, as appropriate, may occasionally be successful.

Because most treatment failures occur within 2 years, patients must be monitored frequently and meticulously during this period. Lifetime follow-up is essential because nearly 33% of these patients develop second primary cancers in the aerodigestive tract.

### Carcinogenesis and Risk Factors

Data indicate that various industrial exposures may be related to cancer of the paranasal sinus and nasal cavity. The risk of a second primary head and neck tumor is considerably increased.[4] A study has shown that a subgroup of paranasal sinus and nasal cavity SCCs are associated with human papilloma virus (HPV) infection and that HPV-positive patients may have a better prognosis than those who are HPV negative.[5]

### References

Mendenhall WM, Werning JW, Pfister DG: Treatment of head and neck cancer. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 729-80.
Laramore GE, ed.: Radiation Therapy of Head and Neck Cancer. Springer-Verlag, 1989.
Thawley SE, Panje WR, Batsakis JG, et al., eds.: Comprehensive Management of Head and Neck Tumors. 2nd ed. WB Saunders, 1999.
Johns ME, Kaplan MJ: Advances in the management of paranasal sinus tumors. In: Wolf GT, ed.: Head and Neck Oncology. Martinus Nijhoff Publishers, 1984, pp 27-52.
Alos L, Moyano S, Nadal A, et al.: Human papillomaviruses are identified in a subgroup of sinonasal squamous cell carcinomas with favorable outcome. Cancer 115 (12): 2701-9, 2009.19365846

## Cellular Classification of Paranasal Sinus and Nasal Cavity Cancer

The most common cell type for paranasal sinus and nasal cavity cancers is squamous cell carcinoma. Minor salivary gland tumors comprise 10% to 15% of these neoplasms. Malignant melanoma presents in less than 1% of neoplasms in this region. Some 5% of cases are malignant lymphomas.[1,2]

Esthesioneuroepithelioma, sometimes confused with undifferentiated carcinoma or undifferentiated lymphoma, arises from the olfactory nerves.[3]

Chondrosarcoma, osteosarcoma, Ewing sarcoma, and most soft tissue sarcomas have been reported for this region.

Inverting papilloma is considered a low-grade benign tumor with a tendency to recur and, in a small percentage of cases, to transform into a malignant tumor.

Midline granuloma, a progressively destructive condition, also involves this region.

### References

Mendenhall WM, Werning JW, Pfister DG: Treatment of head and neck cancer. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 729-80.
Goldenberg D, Golz A, Fradis M, et al.: Malignant tumors of the nose and paranasal sinuses: a retrospective review of 291 cases. Ear Nose Throat J 80 (4): 272-7, 2001.11338653 21237326
Jethanamest D, Morris LG, Sikora AG, et al.: Esthesioneuroblastoma: a population-based analysis of survival and prognostic factors. Arch Otolaryngol Head Neck Surg 133 (3): 276-80, 2007.17372086

## Stage Information for Paranasal Sinus and Nasal Cavity Cancer

The staging systems are clinical estimates of the extent of disease. The assessment of the tumor is based on inspection, palpation, and direct endoscopy when necessary. The tumor must be confirmed histologically, and any other pathological data obtained on biopsy may be included. The appropriate nodal drainage areas are examined by careful palpation. Computed tomographic and/or magnetic resonance imaging studies are generally required to adequately evaluate tumor extent before surgical resection or definitive radiation therapy. If a patient's disease relapses, complete restaging must be done to select the appropriate additional therapy.[1,2]

### American Joint Committee on Cancer (AJCC) Stage Groupings and TNM Definitions

Staging for nasal cavity and paranasal sinus carcinomas is not as well established as staging for other head and neck tumors. For cancer of the maxillary sinus, the nasal cavity, and the ethmoid sinus, the AJCC has designated staging by TNM (tumor, node, metastasis) classification. Lymphomas, sarcomas, and mucosal melanomas of the paranasal sinuses and nasal cavity are not staged using this system.[3] The staging described below is used only for patients who have not had a lymph node dissection of the neck.

Table 1. Definition of Primary Tumor (T)^a^

T Category | Maxillary Sinus T Criteria | Nasal Cavity and Ethmoid Sinus T Criteria
TX | Primary tumor cannot be assessed. | Primary tumor cannot be assessed.
Tis | Carcinoma in situ. | Carcinoma in situ.
T1 | Tumor limited to maxillary sinus mucosa with no erosion or destruction of bone. | Tumor restricted to any one subsite, with or without bony invasion.
T2 | Tumor causing bone erosion or destruction including extension into the hard palate and/or middle nasal meatus, except extension to posterior wall of maxillary sinus and pterygoid plates. | Tumor invading two subsites in a single region or extending to involve an adjacent region within the nasoethmoidal complex, with or without bony invasion.
T3 | Tumor invades any of the following: bone of the posterior wall of maxillary sinus, subcutaneous tissues, floor or medial wall of orbit, pterygoid fossa, ethmoid sinuses. | Tumor extends to invade the medial wall or floor of the orbit, maxillary sinus, palate, or cribriform plate.
T4 | Moderately advanced or very advanced local disease. | Moderately advanced or very advanced local disease.
–T4a | Moderately advanced local disease. Tumor invades anterior orbital contents, skin of cheek, pterygoid plates, infratemporal fossa, cribriform plate, sphenoid or frontal sinuses. | Moderately advanced local disease. Tumor invades any of the following: anterior orbital contents, skin of nose or cheek, minimal extension to anterior cranial fossa, pterygoid plates, sphenoid or frontal sinuses.
–T4b | Very advanced local disease. Tumor invades any of the following: orbital apex, dura, brain, middle cranial fossa, cranial nerves other than maxillary division of trigeminal nerve (V2), nasopharynx, or clivus. | Very advanced local disease. Tumor invades any of the following: orbital apex, dura, brain, middle cranial fossa, cranial nerves other than V2, nasopharynx, or clivus.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 2. Definition of Regional Lymph Node (N)^a^

N Category | Clinical Node (cN) Criteria
NX | Regional lymph nodes cannot be assessed.
N0 | No regional lymph node metastasis.
N1 | Metastasis in a single ipsilateral lymph node, ≤3 cm in greatest dimension and ENE(‒).
N2 | Metastasis in a single ipsilateral node >3 cm but ≤6 cm in greatest dimension and ENE(‒); or metastases in multiple ipsilateral lymph nodes, none >6 cm in greatest dimension and ENE(‒); or in bilateral or contralateral lymph nodes, none >6 cm in greatest dimension and ENE(‒).
–N2a | Metastasis in a single ipsilateral node >3 cm but ≤6 cm in greatest dimension and ENE(‒).
–N2b | Metastases in multiple ipsilateral nodes, none >6 cm in greatest dimension and ENE(‒).
–N2c | Metastases in bilateral or contralateral lymph nodes, none >6 cm in greatest dimension and ENE(‒).
N3 | Metastasis in a lymph node >6 cm in greatest dimension and ENE(‒); or metastasis in any node(s) with clinically overt ENE(+).
–N3a | Metastasis in a lymph node >6 cm in greatest dimension and ENE(‒).
–N3b | Metastasis in any node(s) with clinically overt ENE (ENEc).

ENE = extranodal extension.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Note: A designation of “U” or “L” may be used for any N category to indicate metastasis above the lower border of the cricoid (U) or below the lower border of the cricoid (L).

Table 3. Definition of Distant Metastasis (M)^a^

M Category | M Criteria
M0 | No distant metastasis (no pathologic M0; use clinical M to complete stage group).
M1 | Distant metastasis.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 4. Definition of TNM Stage 0^a^

Stage | TNM | Description
0 | Tis, N0, M0 | Tis = See Table 1.
0 | Tis, N0, M0 | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 5. Definition of TNM Stage I^a^

Stage | TNM | Description
I | T1, N0, M0 | T1 = See Table 1.
I | T1, N0, M0 | N0 = No regional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 6. Definition of TNM Stage II^a^

Stage | TNM | Description
II | T2, N0, M0 | T2 = See Table 1.
II | T2, N0, M0 | N0 = No regional lymph node metastasis.
II | T2, N0, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 7. Definitions of TNM Stage III^a^

Stage | TNM | Description
III | T3, N0, M0 | T3 = See Table 1.
III | T3, N0, M0 | N0 = No regional lymph node metastasis.
III | T3, N0, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).
III | T1, T2, T3; N1, M0 | T1, T2, T3 = See Table 1.
III | T1, T2, T3; N1, M0 | N1 = Metastasis in a single ipsilateral lymph node, ≤3 cm in greatest dimension and ENE(‒).
III | T1, T2, T3; N1, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).

T = primary tumor; N = regional lymph node; M = distant metastasis; ENE = extranodal extension.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

Table 8. Definitions of TNM Stage IVA, IVB, and IVC^a^

Stage | TNM | Description
IVA | T4a; N0, N1; M0 | T4a = See Table 1.
IVA | T4a; N0, N1; M0 | N0, N1 = See Table 2.
IVA | T4a; N0, N1; M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).
IVA | T1, T2, T3, T4a; N2, M0 | T1, T2, T3, T4a = See Table 1.
IVA | T1, T2, T3, T4a; N2, M0 | N2 = See Table 2.
IVA | T1, T2, T3, T4a; N2, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).
IVB | Any T, N3, M0 | Any T = See Table 1.
IVB | Any T, N3, M0 | N3 = See Table 2.
IVB | Any T, N3, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).
IVB | T4b, Any N, M0 | T4b = See Table 1.
IVB | T4b, Any N, M0 | Any N = See Table 2.
IVB | T4b, Any N, M0 | M0 = No distant metastasis (no pathological M0; use clinical M to complete stage group).
IVC | Any T, Any N, M1 | Any T = See Table 1.
IVC | Any T, Any N, M1 | Any N = See Table 2.
IVC | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 137–47.

### References

Mendenhall WM, Werning JW, Pfister DG: Treatment of head and neck cancer. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 729-80.
Laramore GE, ed.: Radiation Therapy of Head and Neck Cancer. Springer-Verlag, 1989.
Nasal cavity and paranasal sinuses. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 137-47.

## Treatment Option Overview for Paranasal Sinus and Nasal Cavity Cancer

Except for patients with T1 mucosal carcinomas, the accepted method of treatment is a combination of radiation therapy and surgery. The incidence of lymph node metastases is generally low (approximately 20% of cases). Thus, routine radical neck dissection or elective neck radiation therapy is recommended only for patients presenting with positive nodes.

For patients with operable tumors, radical surgery is generally performed first to remove the bulk of the tumor and to establish drainage of the affected sinus(es). This is followed by postoperative radiation therapy. Some institutions continue to give a full dose of radiation therapy preoperatively for all patients with stage II and stage III tumors and operate 4 to 6 weeks later.[1-3] A review of published clinical results of radical radiation therapy for head and neck cancer suggested a significant loss of local control with prolonged radiation therapy; therefore, lengthening of standard treatment schedules should be avoided whenever possible.[4]

### Surgery

Surgical exploration may be required to determine operability.

Relative contraindications to surgery include destruction of the base of the skull (i.e., anterior cranial fossa), cavernous sinus, or the pterygoid process; infiltration of the mucous membranes of the nasopharynx; or nonresectable lymph node metastases. Surgical approaches include fenestration with removal of the bulk tumor, which is usually followed by radiation therapy or block resection of the upper jaw. A combined craniofacial approach, including resection of the floor of the anterior cranial fossa, has been used with success in selected patients.[5] Removal of the eye is performed if the orbit is extensively invaded by cancer. Clinically positive nodes, if resectable, may be treated with radical neck dissection.

### Radiation Therapy

Radiation therapy must be carried to high doses for any significant probability of permanent control. The treatment volume must include all of the maxillary antrum and involved hemiparanasal sinus and contiguous areas. The orbit and its contents are excluded except under unusual circumstances. Lymph nodes of the neck, when palpable, should be treated in conjunction with treatment of advanced carcinomas of the antrum. This may be unnecessary for early tumors.

Accumulating evidence has demonstrated a high incidence (>30%–40%) of hypothyroidism in patients who have received external-beam radiation therapy to the entire thyroid gland or to the pituitary gland. Thyroid function testing of patients should be considered prior to therapy and as part of posttreatment follow-up.[6,7]

### Recurrent Disease

Patients with recurrent disease should consider chemotherapy clinical trials. Chemotherapy for recurrent squamous cell cancer of the head and neck has been shown to be efficacious as palliation and may improve a patient's quality of life and length of survival. Various drug combinations, including cisplatin, fluorouracil, and methotrexate, are effective.[8,9]

Treatment of tumors of the paranasal sinuses and of the nasal cavity should be planned on an individual basis because of the complexity involved.

#### Fluorouracil dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[10,11] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[10-12] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[13-15] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[16] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[17]

### References

Mendenhall WM, Werning JW, Pfister DG: Treatment of head and neck cancer. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 729-80.
Laramore GE, ed.: Radiation Therapy of Head and Neck Cancer. Springer-Verlag, 1989.
Thawley SE, Panje WR, Batsakis JG, et al., eds.: Comprehensive Management of Head and Neck Tumors. 2nd ed. WB Saunders, 1999.
Fowler JF, Lindstrom MJ: Loss of local control with prolongation in radiotherapy. Int J Radiat Oncol Biol Phys 23 (2): 457-67, 1992.1534082 92267912
Ganly I, Patel SG, Singh B, et al.: Craniofacial resection for malignant paranasal sinus tumors: Report of an International Collaborative Study. Head Neck 27 (7): 575-84, 2005.15825201
Turner SL, Tiver KW, Boyages SC: Thyroid dysfunction following radiotherapy for head and neck cancer. Int J Radiat Oncol Biol Phys 31 (2): 279-83, 1995.7836081 95137798
Constine LS: What else don't we know about the late effects of radiation in patients treated for head and neck cancer? Int J Radiat Oncol Biol Phys 31 (2): 427-9, 1995.7836099 95137818
Jacobs C, Lyman G, Velez-García E, et al.: A phase III randomized study comparing cisplatin and fluorouracil as single agents and in combination for advanced squamous cell carcinoma of the head and neck. J Clin Oncol 10 (2): 257-63, 1992.1732427 92121936
Schornagel JH, Verweij J, de Mulder PH, et al.: Randomized phase III trial of edatrexate versus methotrexate in patients with metastatic and/or recurrent squamous cell carcinoma of the head and neck: a European Organization for Research and Treatment of Cancer Head and Neck Cancer Cooperative Group study. J Clin Oncol 13 (7): 1649-55, 1995.7602354 95325882
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Treatment of Stage I Paranasal Sinus and Nasal Cavity Cancer

Stage I disease includes small lesions.

### Maxillary Sinus Tumors

Maxillary sinus tumors are small lesions of the infrastructure.

Treatment options for stage I maxillary sinus tumors include the following:

1. Surgical resection.
2. Postoperative radiation therapy should be considered for close margins (particularly in tumors of the suprastructure).

### Ethmoid Sinus Tumors

Ethmoid sinus tumors are usually extensive when diagnosed.[1-3]

Treatment options for stage I ethmoid sinus tumors include the following:

1. External-beam radiation therapy alone is generally used for unresectable lesions.
2. Well-localized lesions can be resected, but resection of the ethmoids, maxilla, and orbit, with consideration for a craniofacial approach, is generally required.
3. If surgery can be done with good functional and cosmetic results, postoperative radiation therapy should be given even with clear surgical margins.

### Sphenoid Sinus Tumors

Treatment options for stage I sphenoid sinus tumors include the following:

1. Treatment is the same as for nasopharyngeal cancers, primarily radiation therapy. For more information, see the Treatment of Stage I Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment.

### Nasal Cavity Tumors

For nasal cavity tumors (squamous cell carcinomas), treatment preferences are either surgery or radiation therapy, which have equal cure rates.

Treatment options for stage I nasal cavity tumors include the following:

1. Surgery for tumors of the septum.
2. Radiation therapy for tumors of the lateral and superior walls.[4]
3. Surgery plus radiation therapy for tumors of the septal and lateral walls.[5]

### Inverting Papillomas

Treatment options for stage I inverting papillomas include the following:

1. Surgical excision.
2. Re-excision for surgery failures.
3. Radical surgery may eventually be necessary.
4. Radiation therapy has been used successfully for surgical failures.

### Melanomas and Sarcomas

Treatment options for stage I melanomas and sarcomas include the following:

1. Surgical excision if possible.
2. Combined surgery, radiation therapy, and chemotherapy are recommended for rhabdomyosarcoma.

### Midline Granulomas

Treatment options for stage I midline granulomas include the following:

1. Radiation therapy to nasal cavity and paranasal sinuses.

### Nasal Vestibule Tumors

Treatment options for stage I nasal vestibule tumors include the following:

1. Surgery or radiation therapy may be performed. If lesions are extremely small, surgery is preferred, provided that no deformity is expected and a need for reconstruction is not anticipated. Radiation therapy is preferred for other small lesions.[6,7] Treatment of the ipsilateral neck should be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kraus DH, Sterman BM, Levine HL, et al.: Factors influencing survival in ethmoid sinus cancer. Arch Otolaryngol Head Neck Surg 118 (4): 367-72, 1992.1313248 92207473
Shah JP: Surgery of the anterior skull base for malignant tumors. Acta Otorhinolaryngol Belg 53 (3): 191-4, 1999.10635391 20101308
Cantù G, Solero CL, Mariani L, et al.: Anterior craniofacial resection for malignant ethmoid tumors--a series of 91 patients. Head Neck 21 (3): 185-91, 1999.10208659 99223358
Hawkins RB, Wynstra JH, Pilepich MV, et al.: Carcinoma of the nasal cavity--results of primary and adjuvant radiotherapy. Int J Radiat Oncol Biol Phys 15 (5): 1129-33, 1988.2846481 89033230
Ang KK, Jiang GL, Frankenthaler RA, et al.: Carcinomas of the nasal cavity. Radiother Oncol 24 (3): 163-8, 1992.1410570 93029625
Levendag PC, Pomp J: Radiation therapy of squamous cell carcinoma of the nasal vestibule. Int J Radiat Oncol Biol Phys 19 (6): 1363-7, 1990.2262359 91086145
Wong CS, Cummings BJ: The place of radiation therapy in the treatment of squamous cell carcinoma of the nasal vestibule. A review. Acta Oncol 27 (3): 203-8, 1988.3046644 88326701

## Treatment of Stage II Paranasal Sinus and Nasal Cavity Cancer

Stage II disease includes small and moderately advanced lesions.

### Maxillary Sinus Tumors

Treatment options for stage II maxillary sinus tumors include the following:

1. Surgical resection with high-dose preoperative or postoperative radiation therapy.

### Ethmoid Sinus Tumors

Ethmoid sinus tumors are usually extensive when diagnosed.[1-3]

Treatment options for stage II ethmoid sinus tumors include the following:

1. External-beam radiation therapy alone is generally used and produces better overall results than surgery.
2. Well-localized lesions can be resected, but resection of the ethmoids, maxilla, and orbit, often with a combined neurosurgical sinus craniofacial approach, is generally required.
3. If surgery can be done with good functional and cosmetic results, postoperative radiation therapy should be given, even when surgical margins are clear.

### Sphenoid Sinus Tumors

Treatment options for stage II sphenoid sinus tumors include the following:

1. Treatment is the same as for nasopharyngeal cancers, primarily radiation therapy. Concurrent chemotherapy and radiation therapy may be considered. For more information, see the Treatment of Stages II, III, and IV Nonmetastatic Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment.

### Nasal Cavity Tumors

For nasal cavity tumors (squamous cell carcinomas), treatment preferences are either surgery or radiation therapy, which have equal cure rates.[4]

Treatment options for stage II nasal cavity tumors include the following:

1. Surgery or radiation therapy for tumors of the septum.
2. Radiation therapy for tumors of the lateral and superior walls. Concurrent chemotherapy and radiation therapy may be considered.
3. Surgery plus radiation therapy for tumors of the septal and lateral walls.[5]

### Inverting Papillomas

Treatment options for stage II inverting papillomas include the following:

1. Surgical excision.
2. Re-excision for surgery failures.
3. Radiation therapy for radical surgery failures may eventually be necessary.

### Melanomas and Sarcomas

Treatment options for stage II melanomas and sarcomas include the following:

1. Surgical excision if possible.
2. Combined surgery, radiation therapy, and chemotherapy are recommended for rhabdomyosarcoma.

### Midline Granulomas

Treatment options for stage II midline granulomas include the following:

1. Radiation therapy to nasal cavity and paranasal sinuses.

### Nasal Vestibule Tumors

Treatment options for stage II nasal vestibule tumors include the following:

1. Surgery or radiation therapy may be performed. If tumors are extremely small, surgery is preferred, provided that no deformity is expected and a need for reconstruction is not anticipated. Radiation therapy is preferred for other small lesions.[6,7] Treatment of the neck should be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kraus DH, Sterman BM, Levine HL, et al.: Factors influencing survival in ethmoid sinus cancer. Arch Otolaryngol Head Neck Surg 118 (4): 367-72, 1992.1313248 92207473
Cantù G, Solero CL, Mariani L, et al.: Anterior craniofacial resection for malignant ethmoid tumors--a series of 91 patients. Head Neck 21 (3): 185-91, 1999.10208659 99223358
Shah JP: Surgery of the anterior skull base for malignant tumors. Acta Otorhinolaryngol Belg 53 (3): 191-4, 1999.10635391 20101308
Hawkins RB, Wynstra JH, Pilepich MV, et al.: Carcinoma of the nasal cavity--results of primary and adjuvant radiotherapy. Int J Radiat Oncol Biol Phys 15 (5): 1129-33, 1988.2846481 89033230
Ang KK, Jiang GL, Frankenthaler RA, et al.: Carcinomas of the nasal cavity. Radiother Oncol 24 (3): 163-8, 1992.1410570 93029625
Levendag PC, Pomp J: Radiation therapy of squamous cell carcinoma of the nasal vestibule. Int J Radiat Oncol Biol Phys 19 (6): 1363-7, 1990.2262359 91086145
Wong CS, Cummings BJ: The place of radiation therapy in the treatment of squamous cell carcinoma of the nasal vestibule. A review. Acta Oncol 27 (3): 203-8, 1988.3046644 88326701

## Treatment of Stage III Paranasal Sinus and Nasal Cavity Cancer

Stage III disease includes small and moderately advanced lesions.

### Maxillary Sinus Tumors

Treatment options for stage III maxillary sinus tumors include the following:

1. Surgical resection with high-dose preoperative or postoperative radiation therapy.
2. Superfractionated preoperative or postoperative radiation therapy (under clinical evaluation).[1]

### Ethmoid Sinus Tumors

Treatment options for stage III ethmoid sinus tumors include the following:

1. Generally, a craniofacial resection in combination with postoperative radiation therapy.[2-4]
2. Clinical trials using new drug combinations for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.

### Sphenoid Sinus Tumors

Treatment options for stage III sphenoid sinus tumors include the following:

1. Treatment is the same as for nasopharyngeal cancers, primarily radiation therapy. For more information, see the Treatment of Stages II, III, and IV Nonmetastatic Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment.
2. Concurrent chemotherapy and radiation therapy may be considered.

### Nasal Cavity Tumors

Nasal cavity tumors are squamous cell carcinomas.

Treatment options for stage III nasal cavity tumors include the following:

1. Surgery alone.
2. Radiation therapy alone.[5] Concurrent chemotherapy and radiation therapy may be considered.
3. Combined surgery and radiation therapy (postoperative radiation therapy is preferred).[5,6]
4. Clinical trials using new drug combinations for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.

### Inverting Papillomas

Treatment options for stage III inverting papillomas include the following:

1. Surgical excision.
2. Re-excision for surgery failures.
3. Radiation therapy or radical surgery may eventually be necessary.

### Melanomas and Sarcomas

Treatment options for stage III melanomas and sarcomas include the following:

1. Surgical excision if possible; otherwise, consider radiation therapy.
2. Combined surgery, radiation therapy, and chemotherapy are recommended for rhabdomyosarcoma.

### Midline Granulomas

Treatment options for stage III midline granulomas include the following:

1. Radiation therapy to nasal cavity and paranasal sinuses.

### Nasal Vestibule Tumors

Treatment options for stage III nasal vestibule tumors include the following:

1. Generally, radiation is preferred to minimize deformity.[7] External-beam (photons or electrons) and/or interstitial implantation can be used. Surgery is reserved for salvage.
2. Clinical trials using new drug combinations for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Johnson CR, Schmidt-Ullrich RK, Wazer DE: Concomitant boost technique using accelerated superfractionated radiation therapy for advanced squamous cell carcinoma of the head and neck. Cancer 69 (11): 2749-54, 1992.1571905 92240564
Kraus DH, Sterman BM, Levine HL, et al.: Factors influencing survival in ethmoid sinus cancer. Arch Otolaryngol Head Neck Surg 118 (4): 367-72, 1992.1313248 92207473
Cantù G, Solero CL, Mariani L, et al.: Anterior craniofacial resection for malignant ethmoid tumors--a series of 91 patients. Head Neck 21 (3): 185-91, 1999.10208659 99223358
Shah JP: Surgery of the anterior skull base for malignant tumors. Acta Otorhinolaryngol Belg 53 (3): 191-4, 1999.10635391 20101308
Hawkins RB, Wynstra JH, Pilepich MV, et al.: Carcinoma of the nasal cavity--results of primary and adjuvant radiotherapy. Int J Radiat Oncol Biol Phys 15 (5): 1129-33, 1988.2846481 89033230
Ang KK, Jiang GL, Frankenthaler RA, et al.: Carcinomas of the nasal cavity. Radiother Oncol 24 (3): 163-8, 1992.1410570 93029625
Wong CS, Cummings BJ: The place of radiation therapy in the treatment of squamous cell carcinoma of the nasal vestibule. A review. Acta Oncol 27 (3): 203-8, 1988.3046644 88326701

## Treatment of Stage IV Paranasal Sinus and Nasal Cavity Cancer

Stage IV disease includes advanced lesions.

### Maxillary Sinus Tumors

Treatment options for stage IV maxillary sinus tumors include the following:

1. High-dose radiation therapy is used because extension to the base of the skull and nasopharynx is a potential, but not absolute, contraindication to surgery. If radiation therapy is to be used alone, localized drainage of the sinus(es) must be established before radiation therapy treatments are initiated.
2. Superfractionated radiation therapy (under clinical evaluation).[1]
3. Clinical trials for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.
4. Concurrent chemotherapy and radiation therapy may be considered.

### Ethmoid Sinus Tumors

Treatment options for stage IV ethmoid sinus tumors include the following:

1. Generally, a craniofacial resection in combination with preoperative or postoperative radiation therapy is performed.[2-4]
2. Concurrent chemotherapy and radiation therapy may be considered for patients with inoperable tumors.
3. Clinical trials for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.

### Sphenoid Sinus Tumors

Treatment options for stage IV sphenoid sinus tumors include the following:

1. Treatment is the same as for nasopharyngeal cancers, primarily radiation therapy. For more information, see the Treatment of Stages II, III, and IV Nonmetastatic Nasopharyngeal Carcinoma and Treatment of Metastatic and Recurrent Nasopharyngeal Carcinoma sections in Nasopharyngeal Carcinoma Treatment.
2. Concurrent chemotherapy and radiation therapy may be considered.

### Nasal Cavity Tumors

Nasal cavity tumors are squamous cell carcinomas.

Treatment options for stage IV nasal cavity tumors include the following:

1. Surgery alone.
2. Radiation therapy alone.[5] Concurrent chemotherapy and radiation therapy may be considered.
3. Combined surgery and radiation therapy (postoperative radiation therapy is preferred).[5]
4. Clinical trials for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.

### Inverting Papillomas

Treatment options for stage IV inverting papillomas include the following:

1. Surgical excision.
2. Re-excision for surgery failures.
3. Radiation therapy or radical surgery may eventually be necessary.

### Melanomas and Sarcomas

Treatment options for stage IV melanomas and sarcomas include the following:

1. Surgical excision if possible.
2. Appropriate radiation therapy and various chemotherapy agents should be considered.

### Midline Granulomas

Treatment options for stage IV midline granulomas include the following:

1. Radiation therapy to nasal cavity and paranasal sinuses.

### Nasal Vestibule Tumors

Treatment options for stage IV nasal vestibule tumors include the following:

1. Generally, radiation therapy is preferred to minimize deformity. External-beam (i.e., photons or electrons) and/or interstitial implantation can be used. Surgery is reserved for salvage. Treatment of the neck should be considered.
2. Clinical trials for advanced tumors should be considered to evaluate chemotherapy preoperatively or before radiation therapy. Adjuvant therapy after surgery or after combined-modality therapy should also be considered.
3. Concurrent chemotherapy and radiation therapy may be considered.

Neoadjuvant chemotherapy as used in clinical trials has been used to shrink tumors and to render them more definitively treatable with either surgery or radiation therapy. This chemotherapy is given before the other modalities; therefore, the designation of neoadjuvant is used to distinguish it from standard adjuvant therapy, which is given after or during definitive therapy with radiation or after surgery. Many drug combinations have been used in neoadjuvant chemotherapy.[6-8]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Johnson CR, Schmidt-Ullrich RK, Wazer DE: Concomitant boost technique using accelerated superfractionated radiation therapy for advanced squamous cell carcinoma of the head and neck. Cancer 69 (11): 2749-54, 1992.1571905 92240564
Kraus DH, Sterman BM, Levine HL, et al.: Factors influencing survival in ethmoid sinus cancer. Arch Otolaryngol Head Neck Surg 118 (4): 367-72, 1992.1313248 92207473
Cantù G, Solero CL, Mariani L, et al.: Anterior craniofacial resection for malignant ethmoid tumors--a series of 91 patients. Head Neck 21 (3): 185-91, 1999.10208659 99223358
Shah JP: Surgery of the anterior skull base for malignant tumors. Acta Otorhinolaryngol Belg 53 (3): 191-4, 1999.10635391 20101308
Hawkins RB, Wynstra JH, Pilepich MV, et al.: Carcinoma of the nasal cavity--results of primary and adjuvant radiotherapy. Int J Radiat Oncol Biol Phys 15 (5): 1129-33, 1988.2846481 89033230
Stupp R, Weichselbaum RR, Vokes EE: Combined modality therapy of head and neck cancer. Semin Oncol 21 (3): 349-58, 1994.8209266 94269651
Al-Sarraf M: Head and neck cancer: chemotherapy concepts. Semin Oncol 15 (1): 70-85, 1988.3278391 88145720
Dimery IW, Hong WK: Overview of combined modality therapies for head and neck cancer. J Natl Cancer Inst 85 (2): 95-111, 1993.8418313 93116111

## Treatment of Recurrent Paranasal Sinus and Nasal Cavity Cancer

Chemotherapy for recurrent head and neck squamous cell cancer has shown promise. Chemotherapy may be indicated when there is recurrence in either distant or local disease after primary surgery or radiation therapy, and when there is residual disease after primary treatment.[1,2] Survival may be improved in those achieving a complete response to chemotherapy.[3] Combined-modality therapy with platinum and radiation therapy has been used in clinical trials such as UMCC-8810.[4]

### Maxillary Sinus Tumors

Treatment options for recurrent maxillary sinus tumors include the following:

1. After surgery, radiation therapy or craniofacial resection with postoperative radiation therapy.
2. After radiation therapy, craniofacial resection if indicated.
3. Chemotherapy should be considered for patients with disease that does not respond to other treatments.
4. Clinical trials using chemotherapy should be considered.[5,6]

### Ethmoid Sinus Tumors

Treatment options for recurrent ethmoid sinus tumors include the following:

1. After limited surgery, craniofacial resection, radiation therapy, or both.[7-9]
2. After radiation therapy, craniofacial resection.
3. Chemotherapy should be considered for patients with disease that does not respond to other treatments.
4. Clinical trials using chemotherapy should be considered.[5,6]

### Sphenoid Sinus Tumors

Treatment options for recurrent sphenoid sinus tumors include the following:

1. Treatment is the same as for nasopharyngeal cancers, primarily radiation therapy. For more information, see the Treatment of Metastatic and Recurrent Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment.
2. Chemotherapy should be considered for patients with disease that does not respond to other treatments.

### Nasal Cavity Tumors

For nasal cavity tumors (squamous cell carcinomas), salvage is possible in approximately 25% of patients.

Treatment options for recurrent nasal cavity tumors include the following:

1. For disease that does not respond to radiation therapy, craniofacial resection.
2. For disease that does not respond to surgery, radiation therapy.
3. Chemotherapy should be considered for patients with disease that does not respond to radiation therapy or surgery.
4. Clinical trials using chemotherapy should be considered.[5,6]

### Inverting Papillomas

Treatment options for recurrent inverting papillomas include the following:

1. Surgical excision.
2. Re-excision for surgery failures.
3. Radical surgery or radiation therapy may eventually be necessary.

### Melanomas and Sarcomas

Treatment options for recurrent melanomas and sarcomas include the following:

1. Surgical excision if possible.
2. Appropriate chemotherapy geared specifically to cell type. For more information, see the Treatment of Metastatic and Recurrent Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment and the Treatment of Recurrent Major Salivary Gland Cancer section in Salivary Gland Cancer Treatment.

### Midline Granulomas

Treatment options for recurrent midline granulomas include the following:

1. Radiation therapy to nasal cavity and paranasal sinuses.

### Nasal Vestibule Tumors

Treatment options for recurrent nasal vestibule tumors include the following:

1. For disease that does not respond to radiation therapy, surgery.
2. For disease that does not respond to surgery, radiation therapy or a combination of surgery and radiation therapy.
3. Chemotherapy should be considered for patients with disease that does not respond to radiation therapy or surgery.
4. Clinical trials using chemotherapy should be considered.[5,6]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kies MS, Levitan N, Hong WK: Chemotherapy of head and neck cancer. Otolaryngol Clin North Am 18 (3): 533-41, 1985.4047673 86015609
LoRusso P, Tapazoglou E, Kish JA, et al.: Chemotherapy for paranasal sinus carcinoma. A 10-year experience at Wayne State University. Cancer 62 (1): 1-5, 1988.2454717 88253092
Al-Kourainy K, Kish J, Ensley J, et al.: Achievement of superior survival for histologically negative versus histologically positive clinically complete responders to cisplatin combination in patients with locally advanced head and neck cancer. Cancer 59 (2): 233-8, 1987.2433016 87102455
Al-Sarraf M, Pajak TF, Marcial VA, et al.: Concurrent radiotherapy and chemotherapy with cisplatin in inoperable squamous cell carcinoma of the head and neck. An RTOG Study. Cancer 59 (2): 259-65, 1987.3802013 87102459
Brasnu D, Laccourreye O, Bassot V, et al.: Cisplatin-based neoadjuvant chemotherapy and combined resection for ethmoid sinus adenocarcinoma reaching and/or invading the skull base. Arch Otolaryngol Head Neck Surg 122 (7): 765-8, 1996.8663951
Licitra L, Locati LD, Cavina R, et al.: Primary chemotherapy followed by anterior craniofacial resection and radiotherapy for paranasal cancer. Ann Oncol 14 (3): 367-72, 2003.12598339
Kraus DH, Sterman BM, Levine HL, et al.: Factors influencing survival in ethmoid sinus cancer. Arch Otolaryngol Head Neck Surg 118 (4): 367-72, 1992.1313248 92207473
Cantù G, Solero CL, Mariani L, et al.: Anterior craniofacial resection for malignant ethmoid tumors--a series of 91 patients. Head Neck 21 (3): 185-91, 1999.10208659 99223358
Shah JP: Surgery of the anterior skull base for malignant tumors. Acta Otorhinolaryngol Belg 53 (3): 191-4, 1999.10635391 20101308

## Latest Updates to This Summary (07/05/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment Option Overview for Paranasal Sinus and Nasal Cavity Cancer

Added Fluorouracil dosing as a new subsection.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult paranasal sinus and nasal cavity cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Paranasal Sinus and Nasal Cavity Cancer Treatment are:

- Andrea Bonetti, MD (Azienda ULSS 9 of the Veneto Region)
- Minh Tam Truong, MD (Boston University Medical Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Paranasal Sinus and Nasal Cavity Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/hp/adult/paranasal-sinus-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389272]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).